# Essiac/Flor Essence (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of Essiac/Flor Essence in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

NOTE: There is either no new research on this topic or the recent published research is weak and not appropriate for inclusion in the summary. Therefore, the information in this summary is no longer being updated and is provided for reference purposes only.

This cancer information summary provides an overview of the use of Essiac and Flor Essence, which are proprietary herbal tea mixtures, as treatments for people with cancer. The summary includes a brief history of the development of Essiac and Flor Essence; a review of laboratory, animal, and human studies; and possible side effects associated with Essiac and Flor Essence use.

This summary contains the following key information:

- Essiac and Flor Essence are herbal tea mixtures originally developed in Canada. There may be differences between Essiac and Flor Essence in their mixture content and effects.
- These products are marketed worldwide as dietary supplements.
- Proponents have claimed that Essiac and Flor Essence can help detoxify the body, strengthen the immune system, and fight cancer.
- Proponents of Essiac have further claimed that it can help relieve pain, reduce side effects, improve quality of life, and reduce tumor size.
- Molecules with antioxidant, anti-inflammatory, anticancer, or immunostimulatory activity have been identified in the individual herbs in the Essiac and Flor Essence formulas.
- No controlled data are available from human studies to suggest that Essiac or Flor Essence can be effective in the treatment of patients with cancer.
- Some evidence suggests that Flor Essence may increase tumor formation in an animal model of breast cancer.

Many of the medical and scientific terms used in the summary are hypertext linked (at first use in each section) to the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/), which is oriented toward nonexperts. When a linked term is clicked, a definition will appear in a separate window.

Reference citations in some PDQ cancer information summaries may include links to external websites that are operated by individuals or organizations for the purpose of marketing or advocating the use of specific treatments or products. These reference citations are included for informational purposes only. Their inclusion should not be viewed as an endorsement of the content of the websites, or of any treatment or product, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board or the National Cancer Institute.

## General Information

Essiac and Flor Essence are proprietary herbal tea mixtures produced by different manufacturers. Essiac is reported to contain four herbs: burdock root (Arctium lappa L.), Indian rhubarb root (Rheum palmatum L., sometimes known as Turkish rhubarb), sheep sorrel (Rumex acetosella L.), and the inner bark of slippery elm (Ulmus fulva Michx. [synonym Ulmus rubra]).[1 -9] Flor Essence is reported to contain the same four herbs as Essiac, plus four potentiating herbs: watercress (Nasturtium officinale R.Br.), blessed thistle (Cnicus benedictus L.), red clover (Trifolium pratense L.), and kelp (Laminaria digitata [Hudson] Lamx.).[2-4,10]

The manufacturers of Essiac and Flor Essence both claim they market the original herbal mixture promoted by the developer.[1,10] Although only one company manufactures Flor Essence,[10] several companies produce and market Essiac-like products.[2,3,9] This summary contains information about the trademarked mixtures only and differentiates between the two products wherever possible. Essiac and Flor Essence may vary in their mixture content and effects.[11]

Essiac and Flor Essence are said to detoxify the body and strengthen the immune system.[1,4,6,8,10] Proponents of Essiac further claim that it helps relieve pain, reduce side effects, improves overall quality of life, may reduce tumor size, and may prolong the survival of patients with various types of cancer. The individual herbs in the Essiac and Flor Essence formulas have been shown to contain molecules that have anticancer, anti-inflammatory, antioxidant, or immunostimulatory activity.[2-4,8,12-15] For more information, see the Laboratory/Animal/Preclinical Studies section. It is said that the benefits of Essiac and Flor Essence are dependent on the presence of the constituent herbs in the correct proportions. In 2004, a mixture of the Essiac herbs showed a decreased proliferation of a prostate cancer cell line.[16] For more information, see the Laboratory/Animal/Preclinical Studies section.

Although the use of Essiac and Flor Essence is generally associated with cancer treatment, both products have been used to treat other health conditions. Essiac has reportedly been used to control diabetes and to treat acquired immunodeficiency syndrome.[6] Flor Essence has reportedly been studied in Russia as a treatment for chronic gastrointestinal diseases (e.g., esophagitis, gastritis, duodenitis, and colitis) and as a treatment for cirrhosis of the liver.[2] However, no controlled data have been published in the peer-reviewed scientific literature to show the safety or the efficacy of Essiac or Flor Essence in patients with cancer or in patients with other health conditions. For more information, see the Human/Clinical Studies section.

Essiac and Flor Essence are sold worldwide as health tonics or herbal dietary supplements.[1,10 ,2-4,9] In the United States, health tonics and dietary supplements are regulated by the U.S. Food and Drug Administration (FDA) as a separate category from foods, cosmetics, and drugs. Unlike drugs, dietary supplements do not require premarket evaluation and approval by the FDA unless specific disease prevention or treatment claims are made. The quality and amount of ingredients in dietary supplements are also regulated by the FDA through Good Manufacturing Practices (GMPs). The FDA GMPs requires that every finished batch of dietary supplement meets each product specification for identity, purity, strength, composition and limits on contamination that may adulterate dietary supplements. Because health tonics and dietary supplements are not formally inspected for manufacturing consistency every year, there may be considerable variation from lot to lot, and there is no guarantee that ingredients identified on product labels are present at all or are present in the specified amounts. The FDA has not approved the use of either Essiac or Flor Essence for the treatment of patients with cancer or any other medical condition.

To conduct clinical drug research in the United States, researchers must file an Investigational New Drug (IND) application with the FDA. An IND application must also be made for clinical evaluation of dietary supplements as agents for the treatment or prevention of disease. The FDA’s IND process is confidential, and the existence of an IND application can be disclosed only by the applicants. No investigator has announced filing an IND application to study either Essiac or Flor Essence in the treatment of patients with cancer.

Essiac and Flor Essence are administered orally in the form of herbal teas.[1,4,6-8,10,17] Originally, an extract of one of the herbs (not specified) was administered to cancer patients by intramuscular injection at or near tumor sites, and the other herbs were administered orally as a tea.

Only minimal information about dose and schedule of administration is freely available from the manufacturer of Essiac.[1] According to the manufacturer, the dose will vary, depending on the reason for ingestion; the manufacturer’s recommended schedules of administration assume a 12-week program of uninterrupted use.[1] Although Essiac is said to be safe for pets, no information is given about its safety in children.[1]

The manufacturer of Flor Essence states that adults may consume from 30 to 360 mL (i.e., 1–12 fl oz) of Flor Essence tea per day, depending on individual requirements, and that it may be used continuously.[10] The manufacturer also suggests that Flor Essence may be safely consumed by infants and children, but its use by pregnant women and nursing mothers is not recommended.[10] However, the promotion of mammary tumors observed in a rat model of breast cancer raises the theoretical concern that Flor Essence may impact normal mammary ductal development during childhood, thereby raising concern about its use.[18]

The manufacturers of Essiac and Flor Essence both state these products can be used in conjunction with other cancer treatments.[1,10] Nonetheless, some proponents of Essiac have recommended that no additional anticancer therapy (such as chemotherapy or radiation therapy) be undertaken while patients are being treated with the mixture.[7] The purported rationale for this statement is that conventional anticancer treatments may alter immune system function and prevent Essiac from working effectively.[7] As indicated previously, no evidence has been reported in the peer-reviewed scientific literature to show either that Essiac is an effective treatment for patients with cancer or that conventional anticancer treatments interfere with its effects.

### References

Essiac. Kirkland, Canada: Altramed Health Products, 2002. Available online (http://www.essiac-resperin.com/). Last accessed April 11, 2016.
Tamayo C, Richardson MA, Diamond S, et al.: The chemistry and biological activity of herbs used in Flor-Essence herbal tonic and Essiac. Phytother Res 14 (1): 1-14, 2000.10641040 20109238
Tamayo C: Essiac for cancer. Alternative Therapies in Women's Health 2 (3): 19-23, 2000.
Kaegi E: Unconventional therapies for cancer: 1. Essiac. The Task Force on Alternative Therapies of the Canadian Breast Cancer Research Initiative. CMAJ 158 (7): 897-902, 1998.9559016 98219770
Ernst E, Cassileth BR: How useful are unconventional cancer treatments? Eur J Cancer 35 (11): 1608-13, 1999.10673970 20138925
Locock RA: Essiac. Can Pharm J 130: 18-9, 1997.
Herbal treatments. In: US Congress, Office of Technology Assessment: Unconventional Cancer Treatments. U.S. Government Printing Office, 1990. OTA-H-405, pp 71-5. Also available online (http://www.princeton.edu/~ota/disk2/1990/9044_n.html). Last accessed April 11, 2016.
Essiac. Toronto, Canada: Canadian Breast Cancer Research Alliance, 1996.
The History of Essiac & Rene Caisse, Canada's Cancer Nurse. Kirkland, Canada: Altramed Health Products, 2001. Available online (http://www.essiacinfo.org/). Last accessed April 11, 2016.
Flora Flor•Essence®. Burnaby, Canada: Flora Manufacturing & Distributing Ltd. Available online (http://www.florahealth.com/product_categories_usa.cfm). Last accessed April 11, 2016.
Cheung S, Lim KT, Tai J: Antioxidant and anti-inflammatory properties of ESSIAC and Flor-Essence. Oncol Rep 14 (5): 1345-50, 2005.16211307
Franke AA, Cooney RV, Custer LJ, et al.: Inhibition of neoplastic transformation and bioavailability of dietary flavonoid agents. In: Manthey JA, Buslig BS, eds.: Flavonoids in the Living System. Plenum Press, 1998. Advances in Experimental Medicine and Biology, 439, pp 237-48.
Waladkhani AR, Clemens MR: Effect of dietary phytochemicals on cancer development (review) Int J Mol Med 1 (4): 747-53, 1998.9852292 99074484
de Witte P: Metabolism and pharmacokinetics of anthranoids. Pharmacology 47 (Suppl 1): 86-97, 1993.8234447 94052327
Campbell MJ, Hamilton B, Shoemaker M, et al.: Antiproliferative activity of Chinese medicinal herbs on breast cancer cells in vitro. Anticancer Res 22 (6C): 3843-52, 2002 Nov-Dec.12553004 22441170
Ottenweller J, Putt K, Blumenthal EJ, et al.: Inhibition of prostate cancer-cell proliferation by Essiac. J Altern Complement Med 10 (4): 687-91, 2004.15353028
LeMoine L: Essiac: an historical perspective. Can Oncol Nurs J 7 (4): 216-21, 1997.9450419 98112218
Bennett LM, Montgomery JL, Steinberg SM, et al.: Flor-Essence herbal tonic does not inhibit mammary tumor development in Sprague Dawley rats. Breast Cancer Res Treat 88 (1): 87-93, 2004.15538049

## History

Essiac was popularized in Canada during the 1920s, when the developer, a nurse from Ontario, began to advocate its use as a cancer treatment. In 1922, the developer obtained an herbal tea formula from a female breast cancer patient who claimed the mixture had cured her disease.[1-5] The patient reportedly received the formula from an Ontario Ojibwa American Indian medicine man. The developer subsequently modified the formula, producing both injectable and oral forms of treatment.[2-8]

From 1934 to 1942, the developer operated a cancer clinic in Bracebridge, Ontario, and dispensed Essiac free of charge.[9] In 1938, members of the Royal Cancer Commission of Canada visited the clinic and heard testimonials from patients who had been treated with the mixture.[7] The Cancer Commission concluded there was only limited evidence for the effectiveness of Essiac. After years of controversy, the developer closed the clinic in 1942 but continued to provide Essiac to patients until the late 1970s.[4] For more information, see the Human/Clinical Studies section.

From 1959 until the late 1970s, the developer collaborated with an American physician to conduct clinical and laboratory studies of Essiac and to promote its use.[7] This collaboration led to the development of the eight-herb formula now marketed as Flor Essence. None of the results of these collaborative studies were reported in peer-reviewed scientific journals.

In 1977, the developer provided a four-herb recipe for Essiac to a Canadian corporation.[5,7] In 1978, the corporation filed a preclinical new drug submission with the Canadian Department of National Health and Welfare (Health Protection Branch) and received permission to conduct clinical studies of Essiac’s safety and effectiveness in cancer patients.[4,5,7,8] In 1982, this permission was withdrawn when it was determined that the corporation had not fulfilled commitments to adequately control the manufacturing consistency of Essiac, to isolate and characterize active substances in the mixture, and to design and execute appropriate clinical trials.[4,5] During this period, restrictions were imposed on the promotion of Essiac as a cancer treatment, but the corporation was allowed to distribute it to cancer patients through their physicians under Canada’s Emergency Drug Release Program (also called Health Canada’s Special Access Programme).[7] While the preclinical new drug submission was in effect in Canada, the corporation filed an unsuccessful New Drug Application (NDA) with the U.S. Food and Drug Administration, seeking permission to market Essiac in the United States. Details of the NDA submission, which can be disclosed only by the corporation, have not been made public.[4] For more information, see the Human/Clinical Studies section.

In the early 1980s, the Canadian Department of National Health and Welfare (Bureau of Human Prescription Drugs) conducted a retrospective review of case summaries submitted by physicians whose patients had obtained Essiac under the Emergency Drug Release Program.[2,4,7] The Department found little evidence to suggest that Essiac was effective as a cancer treatment. For more information, see the Human/Clinical Studies section.

Also in the 1980s, the manufacturers of Essiac-like products began to market their formulations as health tonics and to avoid making claims of effectiveness in treating disease. Consequently, the mixtures were no longer subject to regulation as drugs. Essiac is not currently available under Canada’s Emergency Drug Release Program.

In 1995, the corporation that acquired the four-herb recipe for Essiac from the developer dissolved voluntarily.[1] Later that year, a new company was formed to manufacture and distribute this proprietary herbal mixture.[1,5]

### References

Essiac. Kirkland, Canada: Altramed Health Products, 2002. Available online (http://www.essiac-resperin.com/). Last accessed April 11, 2016.
Tamayo C: Essiac for cancer. Alternative Therapies in Women's Health 2 (3): 19-23, 2000.
Locock RA: Essiac. Can Pharm J 130: 18-9, 1997.
Herbal treatments. In: US Congress, Office of Technology Assessment: Unconventional Cancer Treatments. U.S. Government Printing Office, 1990. OTA-H-405, pp 71-5. Also available online (http://www.princeton.edu/~ota/disk2/1990/9044_n.html). Last accessed April 11, 2016.
LeMoine L: Essiac: an historical perspective. Can Oncol Nurs J 7 (4): 216-21, 1997.9450419 98112218
Tamayo C, Richardson MA, Diamond S, et al.: The chemistry and biological activity of herbs used in Flor-Essence herbal tonic and Essiac. Phytother Res 14 (1): 1-14, 2000.10641040 20109238
Kaegi E: Unconventional therapies for cancer: 1. Essiac. The Task Force on Alternative Therapies of the Canadian Breast Cancer Research Initiative. CMAJ 158 (7): 897-902, 1998.9559016 98219770
Essiac. Toronto, Canada: Canadian Breast Cancer Research Alliance, 1996.
The History of Essiac & Rene Caisse, Canada's Cancer Nurse. Kirkland, Canada: Altramed Health Products, 2001. Available online (http://www.essiacinfo.org/). Last accessed April 11, 2016.

## Laboratory/Animal/Preclinical Studies

### Essiac

In 2004, a mixture of the Essiac herbs showed a decreased proliferation in a prostate cancer cell line.[1] Results of laboratory (in vitro) studies of Essiac have been reported.[2,3]

In the mid-1970s, the developer submitted both dried and liquid samples of Essiac to the Memorial Sloan Kettering Cancer Center (MSKCC) in New York City for evaluation of its immunotherapeutic and chemotherapeutic potential.[3] No immunostimulatory or chemotherapeutic activity was detected in eight animal experiments that utilized the S-180 mouse sarcoma tumor model.

In the early 1980s, the corporation that acquired the four-herb recipe for Essiac from the developer submitted another sample to the MSKCC for evaluation in additional animal studies. No anticancer activity was detected in 17 separate experiments that utilized a variety of animal leukemia and tumor models.[3]

In 1983, the National Cancer Institute tested a liquid sample of Essiac that was provided by the manufacturer after the Canadian Department of National Health and Welfare (Health Protection Branch) requested that it be tested in animals.[3] These studies revealed no anticancer activity in the mouse P388 lymphocytic leukemia tumor system and found lethal toxicity at the highest concentrations of Essiac administered to test animals. It is not known, however, how the concentrations used in these animal tests compare with the concentrations achieved in humans after the consumption of the manufacturer's recommended doses.

### Flor Essence

There are conflicting results in the peer-reviewed literature. One study suggests that Flor Essence enhances tumor growth in vitro, a finding that contradicts the widely available anecdotal evidence that this product suppresses or inhibits tumor development.[4] Another study suggests that the growth of human breast cancer cells is stimulated through estrogen receptor (ER)–mediated as well as ER-independent mechanisms of action from Flor Essence and Essiac herbal tonics.[5] A third study demonstrated antiproliferative and differentiation-inducing properties in vitro only in high concentrations of Essiac and Flor Essence herbal teas.[6]

The 2004 in vivo study of Flor Essence in a rat model looked at mammary tumor development following administration of the herbal compound. Sprague-Dawley rats (N = 112) were assigned to one of three groups. The control group (n = 35) received water only. The second group (n = 40) received 3% Flor Essence in their drinking water in an attempt to provide a dose equivalent to that recommended in the popular literature. The third group (n = 37) received 6% Flor Essence in their drinking water to investigate the dose-response relationship. Mammary tumors were induced by a 40 mg/kg of body weight dose of 7,12-dimethylbenz(a)anthracene. At 19 weeks, palpable mammary tumor incidence was higher (65% and 59.4%) in both Flor Essence groups, compared with controls (51%). Terminal necropsy was performed at age 23 weeks or when tumor burden became too great. Results showed mammary tumor incidence was 82.5% for controls, compared with 90% and 97.3%, respectively, for rats consuming 3% and 6% Flor Essence.[4]

### The Individual Herbs of Essiac and Flor Essence

Laboratory and animal experiments have shown that some of the chemicals in the herbs used to make Essiac and Flor Essence have antioxidant, anti-inflammatory, estrogenic, or anticancer activity.[7- 15]

Among the herbs used in both mixtures, burdock root (Arctium lappa L.) contains several flavonoids and polyphenols that have shown antioxidant activity; Indian rhubarb root (Rheum palmatum L.) contains several anthraquinones, including emodin and aloe-emodin, which have demonstrated anti-inflammatory and cytotoxic effects; sheep sorrel (Rumex acetosella L.) contains several types of anthraquinones, including emodin and aloe-emodin, as well as phytoestrogens, which may possess both procancer and anticancer activity; and slippery elm bark (Ulmus fulva Michx.) has been shown to contain antioxidants.[7-13]

Among the herbs found in Flor Essence alone, watercress (Nasturtium officinale R.Br.) contains phenethyl isothiocyanate (PEITC), which has shown cytotoxic and antitumor activities; blessed thistle (Cnicus benedictus L.) contains cnicin, which is a sesquiterpene lactone that has demonstrated cytotoxic, antitumor, and anti-inflammatory effects, and arctiin and arctigenin, which are lignans that have shown anticancer activity; red clover (Trifolium pratense L.) contains a complex mixture of phytoestrogens, including genistein, which has demonstrated antiangiogenic, estrogenic, and procancer and anticancer effects (depending on the dose); and extracts of kelp (Laminaria digitata [Hudson] Lamx.) have shown immunostimulatory and antitumor activities.[7,8,11,12,15]

Whether equivalent concentrations of relevant molecules can be achieved in the bloodstream of individuals who consume Essiac or Flor Essence in the amounts recommended by their manufacturers has not been determined. An uncharacterized Flor Essence commercial product was dosed at amounts lower than those recommended by the manufacturers for humans, and there was an increase in tumor incidence in this model.[4]

### References

Ottenweller J, Putt K, Blumenthal EJ, et al.: Inhibition of prostate cancer-cell proliferation by Essiac. J Altern Complement Med 10 (4): 687-91, 2004.15353028
Seely D, Kennedy DA, Myers SP, et al.: In vitro analysis of the herbal compound Essiac. Anticancer Res 27 (6B): 3875-82, 2007 Nov-Dec.18225545
Herbal treatments. In: US Congress, Office of Technology Assessment: Unconventional Cancer Treatments. U.S. Government Printing Office, 1990. OTA-H-405, pp 71-5. Also available online (http://www.princeton.edu/~ota/disk2/1990/9044_n.html). Last accessed April 11, 2016.
Bennett LM, Montgomery JL, Steinberg SM, et al.: Flor-Essence herbal tonic does not inhibit mammary tumor development in Sprague Dawley rats. Breast Cancer Res Treat 88 (1): 87-93, 2004.15538049
Kulp KS, Montgomery JL, Nelson DO, et al.: Essiac and Flor-Essence herbal tonics stimulate the in vitro growth of human breast cancer cells. Breast Cancer Res Treat 98 (3): 249-59, 2006.16541326
Tai J, Cheung S, Wong S, et al.: In vitro comparison of Essiac and Flor-Essence on human tumor cell lines. Oncol Rep 11 (2): 471-6, 2004.14719086
Tamayo C, Richardson MA, Diamond S, et al.: The chemistry and biological activity of herbs used in Flor-Essence herbal tonic and Essiac. Phytother Res 14 (1): 1-14, 2000.10641040 20109238
Tamayo C: Essiac for cancer. Alternative Therapies in Women's Health 2 (3): 19-23, 2000.
Kaegi E: Unconventional therapies for cancer: 1. Essiac. The Task Force on Alternative Therapies of the Canadian Breast Cancer Research Initiative. CMAJ 158 (7): 897-902, 1998.9559016 98219770
Essiac. Toronto, Canada: Canadian Breast Cancer Research Alliance, 1996.
Franke AA, Cooney RV, Custer LJ, et al.: Inhibition of neoplastic transformation and bioavailability of dietary flavonoid agents. In: Manthey JA, Buslig BS, eds.: Flavonoids in the Living System. Plenum Press, 1998. Advances in Experimental Medicine and Biology, 439, pp 237-48.
Waladkhani AR, Clemens MR: Effect of dietary phytochemicals on cancer development (review) Int J Mol Med 1 (4): 747-53, 1998.9852292 99074484
de Witte P: Metabolism and pharmacokinetics of anthranoids. Pharmacology 47 (Suppl 1): 86-97, 1993.8234447 94052327
Campbell MJ, Hamilton B, Shoemaker M, et al.: Antiproliferative activity of Chinese medicinal herbs on breast cancer cells in vitro. Anticancer Res 22 (6C): 3843-52, 2002 Nov-Dec.12553004 22441170
Boué SM, Wiese TE, Nehls S, et al.: Evaluation of the estrogenic effects of legume extracts containing phytoestrogens. J Agric Food Chem 51 (8): 2193-9, 2003.12670155 22557758

## Human/Clinical Studies

### Essiac

No report of a clinical study of Essiac has been published in the peer-reviewed scientific literature. Brief descriptions of one incomplete clinical study and one retrospective evaluation of Essiac as a treatment for cancer have been published.[1-6] It is not clear whether the described patient populations consisted entirely of adults or whether they included children.

As noted previously, the developer provided a four-herb recipe for Essiac to a Canadian corporation in 1977.[2,6] For more information, see the History section. In 1978, the corporation filed a preclinical new drug submission with the Canadian Department of National Health and Welfare (Health Protection Branch) and received permission to conduct studies on the safety and the efficacy of Essiac in cancer patients.[2,4- 7] In 1982, the Department withdrew its permission after determining the research was not being conducted as planned. For more information, see the History section. At that time, the available incomplete data were reviewed, and no clear evidence of improved survival could be demonstrated for treated patients.[1,2,5,6] Pain control and quality of life were not assessed in these studies. The review of the data indicated, however, that Essiac was not toxic. Because no evidence of harm was found, the Canadian government allowed the corporation to distribute Essiac to cancer patients through their physicians under Canada’s Emergency Drug Release Program. Nonetheless, restrictions were imposed on the promotion of Essiac as a treatment for cancer.[2] Access to Essiac under Canada’s Emergency Drug Release Program has since been discontinued.

In the early 1980s, the Canadian Department of National Health and Welfare (Bureau of Human Prescription Drugs) conducted a retrospective review of data voluntarily submitted by physicians for 86 cancer patients who had obtained Essiac under Canada’s Emergency Drug Release Program between 1978 and 1982.[1,2,4] (Note: [2] states that data from 87 patients were reviewed.) The Bureau’s evaluation was based on written summaries submitted by the physicians and not on a review of the original patient records.[4] The Bureau found 47 patients who did not benefit from Essiac; 1 had subjective improvement, 5 required fewer analgesics, 4 had an objective response, and four were in stable condition.[1,4] Among the remaining 25 patients, 17 had died, and the reports for 8 were considered unevaluable. The Bureau solicited additional information about the four patients who had an objective response and the four patients who were in stable condition. This additional information revealed that, among these eight patients, two had died, three had progressive disease, and three remained in stable condition.[1,4] The three patients in stable condition had received previous conventional therapy. Therefore, the benefits of treatment for these patients, if any, could not be clearly ascribed to Essiac.[4]

A brief case study was published on a patient with prostate cancer who began drinking Essiac tea after experiencing a rising prostate-specific antigen (PSA) level despite hormonal therapy.[8] The patient reported a dramatic and sustained drop in PSA level soon after starting Essiac; this effect lasted for several months. The authors of the study indicated that the PSA response could not be unequivocally attributed to Essiac and suggested the need for prospective clinical studies.

### Flor Essence

No results of human studies of Flor Essence have been reported anecdotally or in the peer-reviewed scientific literature.

### References

Tamayo C: Essiac for cancer. Alternative Therapies in Women's Health 2 (3): 19-23, 2000.
Kaegi E: Unconventional therapies for cancer: 1. Essiac. The Task Force on Alternative Therapies of the Canadian Breast Cancer Research Initiative. CMAJ 158 (7): 897-902, 1998.9559016 98219770
Locock RA: Essiac. Can Pharm J 130: 18-9, 1997.
Herbal treatments. In: US Congress, Office of Technology Assessment: Unconventional Cancer Treatments. U.S. Government Printing Office, 1990. OTA-H-405, pp 71-5. Also available online (http://www.princeton.edu/~ota/disk2/1990/9044_n.html). Last accessed April 11, 2016.
Essiac. Toronto, Canada: Canadian Breast Cancer Research Alliance, 1996.
LeMoine L: Essiac: an historical perspective. Can Oncol Nurs J 7 (4): 216-21, 1997.9450419 98112218
Campbell MJ, Hamilton B, Shoemaker M, et al.: Antiproliferative activity of Chinese medicinal herbs on breast cancer cells in vitro. Anticancer Res 22 (6C): 3843-52, 2002 Nov-Dec.12553004 22441170
Al-Sukhni W, Grunbaum A, Fleshner N: Remission of hormone-refractory prostate cancer attributed to Essiac. Can J Urol 12 (5): 2841-2, 2005.16274521

## Adverse Effects

Nausea and vomiting are the only reported adverse effects associated with the use of Essiac.[1] The manufacturer of Flor Essence states that users may experience increased bowel movements, frequent urination, swollen glands, skin blemishes, flu-like symptoms, or slight headaches.[2]

### References

Herbal treatments. In: US Congress, Office of Technology Assessment: Unconventional Cancer Treatments. U.S. Government Printing Office, 1990. OTA-H-405, pp 71-5. Also available online (http://www.princeton.edu/~ota/disk2/1990/9044_n.html). Last accessed April 11, 2016.
Flora Flor•Essence®. Burnaby, Canada: Flora Manufacturing & Distributing Ltd. Available online (http://www.florahealth.com/product_categories_usa.cfm). Last accessed April 11, 2016.

## Summary of the Evidence for Essiac and Flor Essence

To assist readers in evaluating the results of human/clinical studies of integrative, alternative, and complementary therapies for cancer, a scoring system has been devised that allows studies of individual treatments to be ranked according to the strength of their evidence (i.e., their level of evidence). Not all studies, however, are given a level of evidence score. To be eligible, a study must:

- Evaluate a therapeutic outcome or outcomes, such as tumor response, improvement in survival, or carefully measured improvement in quality of life.
- Be reported in a peer-reviewed scientific journal.
- Have its clinical findings published in sufficient detail for a meaningful evaluation to be made.

Evidence from studies that do not meet these requirements is considered extremely weak. In addition to scoring individual studies, an overall level of evidence assessment is usually made.

Because no study of the use of Essiac or Flor Essence in humans has been reported in a peer-reviewed scientific journal, no level-of-evidence analysis is possible for these mixtures. The data that are available, however, do not support claims that Essiac and Flor Essence can detoxify the body, strengthen the immune system, or fight cancer. At this time, evidence does not support the use of either Essiac or Flor Essence in the treatment of cancer patients outside the context of well-designed clinical trials.

Separate levels-of-evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For additional information about levels of evidence analysis, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

## Latest Updates to This Summary (04/10/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of Essiac/Flor Essence in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Essiac/Flor Essence. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/essiac-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389495]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).